# RUNX1-Familial Platelet Disorder (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of RUNX1-FPD. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction and Clinical Manifestations of RUNX1–Familial Platelet Disorder (RUNX1-FPD)

RUNX1 (Runt-related transcription factor 1) is a key transcription factor involved in hematopoietic differentiation, and it is one of the most commonly mutated genes in myeloid malignancies.[1]

Inherited pathogenic variants in the RUNX1 gene lead to an autosomal dominant hereditary cancer syndrome called RUNX1-familial platelet disorder (RUNX1-FPD) (also referred to as FPD with a propensity towards myeloid malignancies [FPD/MM] or acute myeloid leukemia [FPD/AML]).[2] Familial platelet functional defects have been clinically recognized for several decades.[3] In 1999, RUNX1 was the first gene found to be associated with FPD/MM. RUNX1-FPD was the first germline predisposition syndrome associated with myeloid malignancies. In 2016, the World Health Organization (WHO) incorporated germline RUNX1 pathogenic variants under a newly created subcategory of myeloid neoplasms called, “myeloid neoplasms with germline predisposition and preexisting platelet disorders.”[4] The WHO's inclusion of RUNX1-FPD in its classification guidelines has increased public awareness of this disorder.

Germline RUNX1 pathogenic variants leading to RUNX1-FPD are associated with the following:[5]

- Lifetime mild to moderate thrombocytopenia associated with aspirin-like functional platelet defects.
- Approximately a 44% lifetime risk of developing myelodysplastic syndrome (MDS), AML, or T-cell acute lymphoblastic leukemia (T-ALL).

Although these are the most commonly reported hematologic cancers seen in individuals with RUNX1-FPD, other cancers have also been reported, including B-cell malignancies and myeloproliferative neoplasms.[6-9] There is a high penetrance of thrombocytopenia and underlying platelet dysfunction in individuals with RUNX1-FPD. Thrombocytopenia is often recognized during childhood, although it has variable expressivity, even within affected families. Hematologic malignancies are diagnosed at a median age of 33 years. However, the reported age range for an MDS or leukemia diagnosis is broad (range, 5 y to 76 y).[5] Genetic anticipation (which can lead to disease manifestations occurring at earlier ages in successive generations) has also been described in RUNX1-FPD.[9,10]

More than 200 families with germline RUNX1 pathogenic variants have been described in the literature.[11] However, it is estimated that 5,515 families with RUNX1 pathogenic variants exist worldwide, based on population incidence and a survey conducted by FPD/AML centers of excellence.[12] Importantly, a RUNX1 database (RUNX1db) and registry is now available as a public resource.[13] RUNX1 somatic variants have been detected in approximately 10% of AML cases, and the vast majority of these variants are somatic in nature. However, some studies have suggested that in an AML cohort, as many as 16% of RUNX1 variants that were identified by somatic testing could be germline in nature.[14,15]

Phenotypic criteria proposed by the ClinGen Myeloid Malignancy Variant Curation Expert Panel (MM-VCEP) state that an individual should exhibit at least one of the following to fit the FPD/AML phenotype:[12]

1. Mild to moderate thrombocytopenia with normal platelet size and volume (in the absence of other causative factors like autoimmune- or drug-related thrombocytopenias).
2. Platelet ultra-structural and/or functional defects, including platelet alpha granule secretion defects, platelet dense granule secretion defects, and impaired platelet aggregation.
3. Diagnosis of a hematologic malignancy (most commonly affecting the myeloid lineage and manifesting as AML or MDS, or less frequently involving the lymphoid lineage and manifesting as T-ALL or other cancers).

In addition to thrombocytopenia and hematologic malignancies, RUNX1-FPD may also be associated with the following features: eczema, psoriasis, arthritis, and other autoimmune disorders.[11]

### References

Schnittger S, Dicker F, Kern W, et al.: RUNX1 mutations are frequent in de novo AML with noncomplex karyotype and confer an unfavorable prognosis. Blood 117 (8): 2348-57, 2011.21148331
Johns Hopkins University: Online Mendelian Inheritance in Man: Platelet Disorder, Familial, with Associated Myeloid Malignancy; FPDMM. Johns Hopkins University, 2014. Available online. (https://www.omim.org/entry/601399) Last accessed October 4, 2023.
Weiss HJ, Chervenick PA, Zalusky R, et al.: A familialdefect in platelet function associated with imapired release of adenosine diphosphate. N Engl J Med 281 (23): 1264-70, 1969.5349805
Arber DA, Orazi A, Hasserjian R, et al.: The 2016 revision to the World Health Organization classification of myeloid neoplasms and acute leukemia. Blood 127 (20): 2391-405, 2016.27069254
Feurstein S, Drazer MW, Godley LA: Genetic predisposition to leukemia and other hematologic malignancies. Semin Oncol 43 (5): 598-608, 2016.27899193
Owen CJ, Toze CL, Koochin A, et al.: Five new pedigrees with inherited RUNX1 mutations causing familial platelet disorder with propensity to myeloid malignancy. Blood 112 (12): 4639-45, 2008.18723428
Linden T, Schnittger S, Groll AH, et al.: Childhood B-cell precursor acute lymphoblastic leukaemia in a patient with familial thrombocytopenia and RUNX1 mutation. Br J Haematol 151 (5): 528-30, 2010.20880108
Shiba N, Hasegawa D, Park MJ, et al.: CBL mutation in chronic myelomonocytic leukemia secondary to familial platelet disorder with propensity to develop acute myeloid leukemia (FPD/AML). Blood 119 (11): 2612-4, 2012.22138511
DiFilippo EC, Coltro G, Carr RM, et al.: Spectrum of abnormalities and clonal transformation in germline RUNX1 familial platelet disorder and a genomic comparative analysis with somatic RUNX1 mutations in MDS/MPN overlap neoplasms. Leukemia 34 (9): 2519-2524, 2020.32060405
Duarte BKL, Yamaguti-Hayakawa GG, Medina SS, et al.: Longitudinal sequencing of RUNX1 familial platelet disorder: new insights into genetic mechanisms of transformation to myeloid malignancies. Br J Haematol 186 (5): 724-734, 2019.31124578
Brown AL, Arts P, Carmichael CL, et al.: RUNX1-mutated families show phenotype heterogeneity and a somatic mutation profile unique to germline predisposed AML. Blood Adv 4 (6): 1131-1144, 2020.32208489
Luo X, Feurstein S, Mohan S, et al.: ClinGen Myeloid Malignancy Variant Curation Expert Panel recommendations for germline RUNX1 variants. Blood Adv 3 (20): 2962-2979, 2019.31648317
Homan CC, King-Smith SL, Lawrence DM, et al.: The RUNX1 database (RUNX1db): establishment of an expert curated RUNX1 registry and genomics database as a public resource for familial platelet disorder with myeloid malignancy. Haematologica 106 (11): 3004-3007, 2021.34233450
Simon L, Spinella JF, Yao CY, et al.: High frequency of germline RUNX1 mutations in patients with RUNX1-mutated AML. Blood 135 (21): 1882-1886, 2020.32315381
Ernst MPT, Kavelaars FG, Löwenberg B, et al.: RUNX1 germline variants in RUNX1-mutant AML: how frequent? Blood 137 (10): 1428-1431, 2021.33075818

## Genetics and Molecular Biology of RUNX1-Familial Platelet Disorder (FPD)

Many of the germline RUNX1 pathogenic variants seem to be unique to probands or families.[1] The majority of RUNX1 germline pathogenic variants described in the literature are inherited, and de novo germline RUNX1 variants have been rarely reported.[2-4] The following types of germline pathogenic variants have been reported in the RUNX1 gene: missense variants, nonsense variants, splice-site variants, single nucleotide variants, small insertions, small deletions, and copy number variants (including intragenic and whole-gene deletions).[3,5,6] Pathogenic variants can happen at any location along the RUNX1 gene, but these variants are most often located within the conserved runt-homology domain (RHD) or the transactivation domain (TAD).[7]

Genomic heterogeneity (in terms of somatic clonal evolution) is common, even among asymptomatic individuals with germline RUNX1 pathogenic variants.[7-9] More than 80% of evaluated individuals with RUNX1-FPD demonstrate clonal evolution by age 50 years. Secondary somatic variants in genes involved in epigenetic regulation (i.e., TET2 and DNMT3A) comprise most variants identified in individuals with RUNX1-FPD who are undergoing surveillance. These secondary variants are commonly associated with age-related clonal hematopoiesis. Many individuals with RUNX1-FPD–associated hematologic malignancies have evidence of cytogenetic abnormalities (e.g., trisomy 21, trisomy 8, monosomy 7). These individuals can also have secondary somatic variants in active signaling pathways (i.e., RAS pathway, KIT pathway) or in tumor suppressor genes (i.e., WT1, PHF6, TP53). Individuals can also have additional somatic variants in the RUNX1 gene.[10]

Notably, baseline morphological and immunophenotypic abnormalities are often present in the bone marrow of asymptomatic individuals with RUNX1-FPD who do not have myelodysplastic syndrome (MDS)/acute myeloid leukemia.[11,12] These abnormalities can include low-for-age bone marrow cellularity and dysplastic megakaryopoiesis, which is often characterized by small, hypolobated megakaryocytes. When mild dysplasia is already present, it can be a challenge to define when an individual's condition progresses to MDS.

### References

Sood R, Kamikubo Y, Liu P: Role of RUNX1 in hematological malignancies. Blood 129 (15): 2070-2082, 2017.28179279
Feurstein S, Luo X, Shah M, et al.: Revision of RUNX1 variant curation rules. Blood Adv 6 (16): 4726-4730, 2022.35764482
Luo X, Feurstein S, Mohan S, et al.: ClinGen Myeloid Malignancy Variant Curation Expert Panel recommendations for germline RUNX1 variants. Blood Adv 3 (20): 2962-2979, 2019.31648317
Feurstein S, Drazer MW, Godley LA: Genetic predisposition to leukemia and other hematologic malignancies. Semin Oncol 43 (5): 598-608, 2016.27899193
Béri-Dexheimer M, Latger-Cannard V, Philippe C, et al.: Clinical phenotype of germline RUNX1 haploinsufficiency: from point mutations to large genomic deletions. Eur J Hum Genet 16 (8): 1014-8, 2008.18478040
Ouchi-Uchiyama M, Sasahara Y, Kikuchi A, et al.: Analyses of Genetic and Clinical Parameters for Screening Patients With Inherited Thrombocytopenia with Small or Normal-Sized Platelets. Pediatr Blood Cancer 62 (12): 2082-8, 2015.26175287
Brown AL, Arts P, Carmichael CL, et al.: RUNX1-mutated families show phenotype heterogeneity and a somatic mutation profile unique to germline predisposed AML. Blood Adv 4 (6): 1131-1144, 2020.32208489
Churpek JE, Pyrtel K, Kanchi KL, et al.: Genomic analysis of germ line and somatic variants in familial myelodysplasia/acute myeloid leukemia. Blood 126 (22): 2484-90, 2015.26492932
DiFilippo EC, Coltro G, Carr RM, et al.: Spectrum of abnormalities and clonal transformation in germline RUNX1 familial platelet disorder and a genomic comparative analysis with somatic RUNX1 mutations in MDS/MPN overlap neoplasms. Leukemia 34 (9): 2519-2524, 2020.32060405
Preudhomme C, Renneville A, Bourdon V, et al.: High frequency of RUNX1 biallelic alteration in acute myeloid leukemia secondary to familial platelet disorder. Blood 113 (22): 5583-7, 2009.19357396
Chisholm KM, Denton C, Keel S, et al.: Bone Marrow Morphology Associated With Germline RUNX1 Mutations in Patients With Familial Platelet Disorder With Associated Myeloid Malignancy. Pediatr Dev Pathol 22 (4): 315-328, 2019.30600763
Kanagal-Shamanna R, Loghavi S, DiNardo CD, et al.: Bone marrow pathologic abnormalities in familial platelet disorder with propensity for myeloid malignancy and germline RUNX1 mutation. Haematologica 102 (10): 1661-1670, 2017.28659335

## Management and Prognosis for RUNX1-Familial Platelet Disorder (FPD)

Surveillance recommendations for individuals with RUNX1-FPD are based on expert opinion and typically include blood work (including a complete blood count [CBC] with differential conducted once or twice annually), in addition to a physical exam.[1] A bone marrow evaluation is suggested when an individual is first diagnosed with RUNX1-FPD. It is suggested that bone marrow evaluation be repeated when changes are found in the individual’s blood counts or when new, concerning medical findings (such as recurrent infections) occur. While annual bone marrow evaluations are often recommended for research purposes, there are no current clinical or pathological criteria that can reliably predict the development of hematologic malignancies in individuals with RUNX1-FPD.

Clinical outcomes and management decisions for individuals with RUNX1-FPD who experience malignant transformation are rarely reported. In general, standard treatment for the underlying malignancy (i.e., myelodysplastic syndrome, acute myeloid leukemia, or T-cell acute lymphoblastic leukemia directed-therapies) and consideration of an allogeneic stem cell transplant are recommended. Potential related donors should be evaluated for the familial RUNX1 pathogenic variant to avoid transplanting stem cells with the same underlying genetic defect whenever possible. This approach can help avoid risks of graft failure and donor-derived leukemias.

### References

Churpek JE, Lorenz R, Nedumgottil S, et al.: Proposal for the clinical detection and management of patients and their family members with familial myelodysplastic syndrome/acute leukemia predisposition syndromes. Leuk Lymphoma 54 (1): 28-35, 2013.22691122

## Latest Updates to This Summary (11/25/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about RUNX1-familial platelet disorder (RUNX1-FPD). It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for RUNX1-Familial Platelet Disorder are:

- Julia Cooper, MS, CGC (Ohio State University)
- Courtney DiNardo, MD, MSC (University of Texas, M.D. Anderson Cancer Center)
- Marcin Wlodarski, MD, PhD (St. Jude Children's Research Hospital)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ RUNX1-Familial Platelet Disorder. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/runx1-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 38113349]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).